# Childhood Hodgkin Lymphoma Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood Hodgkin lymphoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly, and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## General Information About Childhood Hodgkin Lymphoma

Key Points for This Section
- Childhood Hodgkin lymphoma is a cancer that develops in the lymph system.
- The two main types of childhood Hodgkin lymphoma are classic and nodular lymphocyte-predominant.
- Epstein-Barr virus infection and a family history of Hodgkin lymphoma can increase the risk of childhood Hodgkin lymphoma.
- Signs of childhood Hodgkin lymphoma include swollen lymph nodes, fever, drenching night sweats, and weight loss.
- Tests that examine the lymph system and other parts of the body are used to diagnose and stage childhood Hodgkin lymphoma.
- You may want to get a second opinion.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Childhood Hodgkin lymphoma is a cancer that develops in the lymph system.

The lymph system is part of the immune system. It helps protect the body from infection and disease.

The lymph system is made up of:

- Lymph: Colorless, watery fluid that travels through the lymph vessels and transports T and B lymphocytes. Lymphocytes are a type of white blood cell.
- Lymph vessels: A network of thin tubes that collect lymph from different parts of the body and return it to the bloodstream.
- Lymph nodes: Small, bean-shaped structures that filter lymph and store white blood cells that help fight infection and disease. Lymph nodes are found along a network of lymph vessels throughout the body. Groups of lymph nodes are found in the neck, underarm, mediastinum (the area between the lungs), abdomen, pelvis, and groin. Hodgkin lymphoma most commonly forms in the lymph nodes above the diaphragm.
- Spleen: An organ that makes lymphocytes, stores red blood cells and lymphocytes, filters the blood, and destroys old blood cells. The spleen is on the left side of the abdomen near the stomach.
- Thymus: An organ in which T lymphocytes mature and multiply. The thymus is in the chest behind the breastbone.
- Bone marrow: The soft, spongy tissue in the center of certain bones, such as the hip bone and breastbone. White blood cells, red blood cells, and platelets are made in the bone marrow.
- Tonsils: Two small masses of lymph tissue at the back of the throat. There is one tonsil on each side of the throat.

The lymph system is part of the body's immune system and is made up of tissues and organs that help protect the body from infection and disease. These include the tonsils, thymus, spleen, bone marrow, lymph vessels, and lymph nodes. Lymph (clear, watery fluid) and lymphocytes (white blood cells) travel through the lymph vessels and into the lymph nodes where the lymphocytes destroy harmful substances. The lymph enters the bloodstream through a large vein near the heart.

Lymph system; drawing shows the tonsils, thymus, spleen, bone marrow, lymph vessels, and lymph nodes. One inset shows the inside structure of a lymph node and the attached lymph vessels with arrows showing how the lymph (clear, watery fluid) moves into and out of the lymph node. Another inset shows a close up of bone marrow with blood cells.

Bits of lymph tissue are also found in other parts of the body such as the lining of the gastrointestinal tract, bronchus, and skin.

There are two general types of lymphoma: Hodgkin lymphoma and non-Hodgkin lymphoma. This summary is about the treatment of childhood Hodgkin lymphoma.

Hodgkin lymphoma occurs most often in adolescents 15 to 19 years of age. The treatment for children and adolescents is different than treatment for adults.

Other PDQ summaries with information related to lymphoma include:

- Childhood Non-Hodgkin Lymphoma Treatment
- Hodgkin Lymphoma Treatment

### The two main types of childhood Hodgkin lymphoma are classic and nodular lymphocyte-predominant.

- Classic Hodgkin lymphoma is the most common type of Hodgkin lymphoma. It occurs most often in adolescents. When a sample of lymph node tissue is looked at under a microscope, Hodgkin lymphoma cancer cells, called Reed-Sternberg cells, may be seen.
  Reed-Sternberg cell. Reed-Sternberg cells are large, abnormal lymphocytes (a type of white blood cell) that may contain more than one nucleus. These cells are found in people with Hodgkin lymphoma. Reed-Sternberg cells are also called Hodgkin and Reed-Sternberg cells.
  Reed-Sternberg cell; photograph shows normal lymphocytes compared with a Reed-Sternberg cell.
  Classic Hodgkin lymphoma is divided into four subtypes, based on how the cancer cells look under a microscope:
  - Nodular-sclerosing Hodgkin lymphoma occurs most often in older children and adolescents. It is common to have a chest mass at diagnosis.
  - Mixed cellularity Hodgkin lymphoma most often occurs in children younger than 10 years of age. It is linked to a history of Epstein-Barr virus (EBV) infection and often occurs in the lymph nodes of the neck.
  - Lymphocyte-rich Hodgkin lymphoma is rare in children. When a sample of lymph node tissue is looked at under a microscope, there are Reed-Sternberg cells and many normal lymphocytes and other blood cells.
  - Lymphocyte-depleted Hodgkin lymphoma is rare in children and occurs most often in older adults and adults with HIV. When a sample of lymph node tissue is looked at under a microscope, there are many large, oddly shaped cancer cells and few normal lymphocytes and other blood cells.
- Nodular lymphocyte-predominant Hodgkin lymphoma is less common than classic Hodgkin lymphoma. It most often occurs in children younger than 10 years of age. Nodular lymphocyte-predominant Hodgkin lymphoma often occurs as a swollen lymph node in the neck, underarm, or groin. Most children do not have any other signs or symptoms of cancer at diagnosis. When a sample of lymph node tissue is looked at under a microscope, the cancer cells are shaped like popcorn.

### Epstein-Barr virus infection and a family history of Hodgkin lymphoma can increase the risk of childhood Hodgkin lymphoma.

Anything that increases a person's chance of getting a disease is called a risk factor. Not every person with one or more of these risk factors will develop childhood Hodgkin lymphoma, and it can develop in some children who don't have any known risk factors. Talk with your child's doctor if you think your child may be at risk.

Risk factors for childhood Hodgkin lymphoma include:

- being infected with the Epstein-Barr virus (EBV)
- being infected with HIV
- having certain diseases of the immune system, such as autoimmune lymphoproliferative syndrome
- having a weakened immune system after an organ transplant or from medicine given after a transplant to stop the organ from being rejected by the body
- having a parent, brother, or sister with a personal history of Hodgkin lymphoma

Inherited changes in genes may increase the risk of childhood Hodgkin lymphoma.

Being exposed to common infections in early childhood may decrease the risk of Hodgkin lymphoma in children.

### Signs of childhood Hodgkin lymphoma include swollen lymph nodes, fever, drenching night sweats, and weight loss.

The signs and symptoms of Hodgkin lymphoma depend on where the cancer forms in the body and the size of the cancer. It's important to check with your child's doctor if your child has:

- painless, swollen lymph nodes near the collarbone or in the neck, chest, underarm, or groin
- fever for no known reason
- weight loss for no known reason
- drenching night sweats
- fatigue
- anorexia
- itchy skin
- coughing
- trouble breathing, especially when lying down
- pain in the lymph nodes after drinking alcohol

Fever for no known reason, weight loss for no known reason, or drenching night sweats are called B symptoms. B symptoms are an important part of staging Hodgkin lymphoma and understanding the patient's chance of recovery.

These symptoms may be caused by problems other than childhood Hodgkin lymphoma. The only way to know is to see your child's doctor. The doctor will ask you when the symptoms started and how often your child has been having them as a first step in making a diagnosis.

### Tests that examine the lymph system and other parts of the body are used to diagnose and stage childhood Hodgkin lymphoma.

If your child has symptoms that suggest Hodgkin lymphoma, the doctor will need to find out if these are due to cancer or to another problem. They will ask about your child's personal and family health history and do a physical exam. The doctor may recommend diagnostic tests to find out if your child has Hodgkin lymphoma. The results of these tests will also help you and your child's doctor plan treatment.

The tests used to diagnose Hodgkin lymphoma may include:

- Complete blood count (CBC): A procedure in which a sample of blood is drawn and checked for:
  - The number of red blood cells, white blood cells, and platelets.
  - The amount of hemoglobin (the protein that carries oxygen) in the red blood cells.
  - The portion of the blood sample made up of red blood cells.
    Complete blood count (CBC). Blood is collected by inserting a needle into a vein and allowing the blood to flow into a tube. The blood sample is sent to the laboratory and the red blood cells, white blood cells, and platelets are counted. The CBC is used to test for, diagnose, and monitor many different conditions.
    Complete blood count (CBC); left panel shows blood being drawn from a vein on the inside of the elbow using a tube attached to a syringe; right panel shows a laboratory test tube with blood cells separated into layers: plasma, white blood cells, platelets, and red blood cells.
- Blood chemistry studies: A procedure in which a blood sample is checked to measure the amounts of certain substances released into the blood, including albumin, by organs and tissues in the body. An unusual (higher or lower than normal) amount of a substance can be a sign of disease.
- C-reactive protein test: A test in which a blood sample is checked to measure the amount of c-reactive protein in the blood. C-reactive protein is made by the liver and sent to the bloodstream in response to inflammation. A higher-than-normal amount of c-reactive protein in the blood may be a sign of disease.
- Sedimentation rate: A procedure in which a sample of blood is drawn and checked for the rate at which the red blood cells settle to the bottom of the test tube. The sedimentation rate is a measure of how much inflammation is in the body. A higher-than-normal sedimentation rate may be a sign of lymphoma. Also called erythrocyte sedimentation rate, sed rate, or ESR.
- CT scan (CAT scan): A procedure that makes a series of detailed pictures of areas inside the body, such as the neck, chest, abdomen, or pelvis, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).
  Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.
  Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.
- PET scan (positron emission tomography scan): A procedure to find malignant tumor cells in the body. A small amount of radioactive glucose (sugar) is injected into a vein. The PET scanner rotates around the body and makes a picture of where glucose is being used in the body. Malignant tumor cells show up brighter in the picture because they are more active and take up more glucose than normal cells do.
  Positron emission tomography (PET) scan. The child lies on a table that slides through the PET scanner. The head rest and white strap help the child lie still. A small amount of radioactive glucose (sugar) is injected into the child's vein, and a scanner makes a picture of where the glucose is being used in the body. Cancer cells show up brighter in the picture because they take up more glucose than normal cells do.
  Positron emission tomography (PET) scan; drawing shows a child lying on table that slides through the PET scanner.
- MRI (magnetic resonance imaging): A procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body, such as the lymph nodes. This procedure is also called nuclear magnetic resonance imaging (NMRI).
  Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.
  Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.
- PET-CT scan: A procedure that combines the pictures from a positron emission tomography (PET) scan and a computed tomography (CT) scan. The PET and CT scans are done at the same time with the same machine. The combined scans give more detailed pictures of areas inside the body than either scan gives by itself.
- PET-MRI scan: A procedure that combines the pictures from a positron emission tomography (PET) scan and a magnetic resonance imaging (MRI) scan. A PET scan uses a radioactive tracer to highlight abnormal areas in the body. An MRI uses radio waves and a powerful magnet to take detailed pictures of tissues in the body. For a PET-MRI, the scans are done at the same time with the same machine. The combined scans give more detailed pictures of areas inside the body than either scan gives by itself. The overall amount of radiation a person is exposed to is also reduced. A PET-MRI may be used to help diagnose disease, such as cancer, plan treatment, or find out how well treatment is working.
- Chest x-ray: An x-ray of the organs and bones inside the chest. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body.
- Bone marrow aspiration and biopsy: The removal of bone marrow and a small piece of bone by inserting a hollow needle into the hipbone or breastbone. A pathologist views the bone marrow and bone under a microscope to look for abnormal cells. Bone marrow aspiration and biopsy is done for patients with advanced disease and/or B symptoms.
  Bone marrow aspiration and biopsy. After a small area of skin is numbed, a bone marrow needle is inserted into the child’s hip bone. Samples of blood, bone, and bone marrow are removed for examination under a microscope.
  Bone marrow aspiration and biopsy; drawing shows a child lying face down on a table and a bone marrow needle being inserted into the right hip bone. An inset shows the bone marrow needle being inserted through the skin into the bone marrow of the hip bone.
- Lymph node biopsy: The removal of all or part of one or more lymph nodes. The lymph node may be removed during an image-guided CT scan or a thoracoscopy, mediastinoscopy, or laparoscopy. One of the following types of biopsies may be done:
  - Excisional biopsy: The removal of an entire lymph node.
  - Incisional biopsy: The removal of part of a lymph node.
  - Core biopsy: The removal of tissue from a lymph node using a wide needle.
  A pathologist views the lymph node tissue under a microscope to check for cancer cells called Reed-Sternberg cells. Reed-Sternberg cells are common in classic Hodgkin lymphoma.
  The following test may be done on tissue that was removed:
  - Immunophenotyping: A laboratory test that uses antibodies to identify cancer cells based on the types of antigens or markers on the surface of the cells. This test is used to help diagnose specific types of lymphoma.

### You may want to get a second opinion.

You may want to get a second opinion to confirm your child's diagnosis and treatment plan. If you seek a second opinion, you will need to get important medical test results from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans before giving a recommendation. They may agree with the first doctor, suggest changes or another approach, or provide more information about your child's cancer.

To learn more about choosing a doctor and getting a second opinion, visit Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your appointments, visit Questions to Ask Your Doctor About Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Certain factors affect prognosis (chance of recovery) and treatment options.

If your child has been diagnosed with Hodgkin lymphoma, you may have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis. The prognosis depends on:

- the stage of the cancer (the size of the cancer, including whether the cancer is a larger tumor mass called bulky disease, and whether the cancer has spread below the diaphragm or to more than one group of lymph nodes)
- whether there are B symptoms (fever for no known reason, weight loss for no known reason, or drenching night sweats) at diagnosis
- the type of Hodgkin lymphoma
- having more than the usual number of white blood cells or anemia at the time of diagnosis
- whether there is fluid around the heart or lungs at diagnosis
- the sedimentation rate or the albumin level in the blood
- the child's sex
- whether the cancer is newly diagnosed or has recurred (come back)

The treatment options also depend on:

- whether there is a low, medium, or high risk the cancer will come back after treatment
- the child's age
- the risk of long-term side effects

Most children and adolescents with newly diagnosed Hodgkin lymphoma can be cured.

Your child's cancer care team is in the best position to talk with you about your child's prognosis.

## Stages of Childhood Hodgkin Lymphoma

Key Points for This Section
- After childhood Hodgkin lymphoma has been diagnosed, tests are done to find out if cancer cells have spread within the lymph system or to other parts of the body.
- There are three ways that cancer spreads in the body.
- The following stages are used for childhood Hodgkin lymphoma:
  - Stage I
  - Stage II
  - Stage III
  - Stage IV
- In addition to the stage number, the letters A, B, E, or S may be noted.
- Childhood Hodgkin lymphoma is treated according to risk groups.
- Sometimes childhood Hodgkin lymphoma does not respond to treatment or comes back after treatment.

### After childhood Hodgkin lymphoma has been diagnosed, tests are done to find out if cancer cells have spread within the lymph system or to other parts of the body.

The process used to find out if cancer has spread is called staging. The information gathered from the staging process determines the stage of the disease. The results of the tests and procedures done to diagnose and stage Hodgkin lymphoma are used to help make decisions about treatment.

### There are three ways that cancer spreads in the body.

Cancer can spread through tissue, the lymph system, and the blood:

- Tissue. The cancer spreads from where it began by growing into nearby areas.
- Lymph system. The cancer spreads from where it began by getting into the lymph system. The cancer travels through the lymph vessels to other parts of the body.
- Blood. The cancer spreads from where it began by getting into the blood. The cancer travels through the blood vessels to other parts of the body.

### The following stages are used for childhood Hodgkin lymphoma:

#### Stage I

Stage I childhood Hodgkin lymphoma. Cancer is found in one or more lymph nodes in a group of lymph nodes or, in rare cases, cancer is found in the Waldeyer’s ring, thymus, or spleen. In stage IE (not shown), cancer has spread to one area outside the lymph system.

Stage I childhood Hodgkin lymphoma; drawing shows cancer in one lymph node group above the diaphragm and in the spleen. Also shown are the Waldeyer’s ring and the thymus. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown inside the lymph node.

Stage I is divided into stage I and stage IE.

- Stage I: Cancer is found in one of the following places in the lymph system:
  - One or more lymph nodes in one lymph node group.
  - Waldeyer's ring.
  - Thymus.
  - Spleen.
- Stage IE: Cancer is found outside the lymph system in one organ or area.

#### Stage II

Stage II is divided into stage II and stage IIE.

- Stage II: Cancer is found in two or more lymph node groups either above or below the diaphragm (the thin muscle below the lungs that helps breathing and separates the chest from the abdomen).
  Stage II childhood Hodgkin lymphoma. Cancer is found in two or more lymph node groups that are either above the diaphragm or below the diaphragm.
  Stage II childhood Hodgkin lymphoma; drawing shows cancer in two lymph node groups above the diaphragm and below the diaphragm. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown inside the lymph node.
- Stage IIE: Cancer has spread from a group of lymph nodes to a nearby organ that is outside the lymph system. Cancer may have spread to other lymph node groups on the same side of the diaphragm.
  Stage IIE childhood Hodgkin lymphoma. Cancer has spread from a group of lymph nodes to a nearby organ or area that is outside the lymph system.
  Stage IIE childhood Hodgkin lymphoma; drawing shows cancer in a lymph node group above the diaphragm and cancer that has spread to a nearby area (the left lung). An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown inside the lymph node.

#### Stage III

In stage III, the cancer is found:

- in lymph node groups above and below the diaphragm (the thin muscle below the lungs that helps breathing and separates the chest from the abdomen); or
- in lymph node groups above the diaphragm and in the spleen.
  Stage III childhood Hodgkin lymphoma. Cancer is found (a) in lymph node groups above and below the diaphragm; or (b) in lymph node groups above the diaphragm and in the spleen.
  Stage III childhood Hodgkin lymphoma; drawing shows (a) cancer in lymph node groups above and below the diaphragm. Also shown is (b) cancer in a lymph node group above the diaphragm and cancer in the spleen. The lungs are also shown. An inset shows a close-up of a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown inside the lymph node.

#### Stage IV

In stage IV, the cancer:

- has spread throughout one or more organs outside the lymph system and may be in lymph nodes near those organs; or
- is found in two or more groups of lymph nodes that are on the same side of the diaphragm (the thin muscle below the lungs that helps breathing and separates the chest from the abdomen) and in an organ that is outside the lymph system and not near the affected lymph nodes; or
- is found in groups of lymph nodes on both side of the diaphragm and in any organ that is outside the lymph system; or
- has spread to the lungs, liver, or bone marrow from areas far away.
  Stage IV childhood Hodgkin lymphoma. Cancer (a) has spread throughout one or more organs outside the lymph system, such as the liver; or (b) is found in two or more groups of lymph nodes that are on the same side of the diaphragm and in an organ that is outside the lymph system, such as the lung, and not near the affected lymph nodes; or (c) is found in groups of lymph nodes on both sides of the diaphragm and in any organ that is outside the lymph system, such as the lung; or (d) has spread to the lungs, liver, or bone marrow from areas far away.
  Stage IV childhood Hodgkin lymphoma; drawing shows four panels: (a) the top left panel shows cancer in the liver; (b) the top right panel shows cancer in the left lung and in two groups of lymph nodes below the diaphragm; (c) the bottom left panel shows cancer in the left lung and in a group of lymph nodes above the diaphragm and below the diaphragm; and (d) the bottom right panel shows cancer in both lungs and the liver. There is also a pullout showing cancer in the bone marrow.

### In addition to the stage number, the letters A, B, E, or S may be noted.

The letters A, B, E, or S may be used to further describe the stage of childhood Hodgkin lymphoma.

- A: The patient does not have B symptoms (fever, weight loss, or drenching night sweats).
- B: The patient has B symptoms.
- E: Cancer is found in an organ or tissue that is not part of the lymph system but which may be next to an area of the lymph system affected by the cancer.
- S: Cancer is found in the spleen.

### Childhood Hodgkin lymphoma is treated according to risk groups.

Untreated childhood Hodgkin lymphoma is divided into risk groups based on the stage, size of the tumor, and whether the patient has B symptoms (fever, weight loss, or drenching night sweats). The risk group describes the likelihood that Hodgkin lymphoma will not respond to treatment or recur (come back) after treatment. It is used to plan initial treatment.

- Low-risk childhood Hodgkin lymphoma.
- Intermediate-risk childhood Hodgkin lymphoma.
- High-risk childhood Hodgkin lymphoma.

Low-risk Hodgkin lymphoma requires fewer cycles of treatment, fewer anticancer drugs, and lower doses of anticancer drugs than high-risk lymphoma.

### Sometimes childhood Hodgkin lymphoma does not respond to treatment or comes back after treatment.

Primary refractory Hodgkin lymphoma is cancer that does not respond to initial treatment.

Recurrent Hodgkin lymphoma is cancer that has recurred (come back) after it has been treated. The lymphoma may come back in the lymph system or in other parts of the body, such as the lungs, liver, bones, or bone marrow.

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for children with Hodgkin lymphoma.
- Children with Hodgkin lymphoma should have their treatment planned by a team of health care providers who are experts in treating childhood cancer.
- The following types of treatment may be used:
  - Chemotherapy
  - Radiation therapy
  - Targeted therapy
  - Immunotherapy
  - Surgery
  - High-dose chemotherapy with stem cell transplant
- Clinical trials
- Treatment for childhood Hodgkin lymphoma causes side effects and late effects.
- Patients may want to think about taking part in a clinical trial.
- Patients can enter clinical trials before, during, or after starting their cancer treatment.
- Follow-up care may be needed.

### There are different types of treatment for children with Hodgkin lymphoma.

There are different types of treatment for children with Hodgkin lymphoma. You and your child's care team will work together to decide treatment. Many factors will be considered, such as your child's overall health, and whether the tumor is newly diagnosed or has come back.

### Children with Hodgkin lymphoma should have their treatment planned by a team of health care providers who are experts in treating childhood cancer.

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment of childhood Hodgkin lymphoma. The pediatric oncologist works with other pediatric health care providers who are experts in treating children with Hodgkin lymphoma and who specialize in certain areas of medicine. Other specialists may include:

- pediatrician
- medical oncologist and hematologist
- radiation oncologist
- pathologist
- pediatric nurse specialist
- psychologist
- social worker
- child-life specialist
- fertility specialist

The treatment of Hodgkin lymphoma in adolescents and young adults may be different than the treatment for children. Some adolescents and young adults are treated with an adult treatment regimen.

### The following types of treatment may be used:

#### Chemotherapy

Chemotherapy is a cancer treatment that uses one or more drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. Cancer treatment using more than one chemotherapy drug is called combination chemotherapy. When chemotherapy is taken by mouth or injected into a vein or muscle, the drugs enter the bloodstream and can reach cancer cells throughout the body (systemic chemotherapy).

The way the chemotherapy is given depends on the risk group. For example, children with low-risk Hodgkin lymphoma receive fewer cycles of treatment, fewer anticancer drugs, and lower doses of anticancer drugs than children with high-risk lymphoma.

For more information, visit Drugs Approved for Hodgkin Lymphoma (https://www.cancer.gov/about-cancer/treatment/drugs/hodgkin-lymphoma).

#### Radiation therapy

Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer.

Certain ways of giving radiation therapy can help keep radiation from damaging nearby healthy tissue. These types of external radiation therapy include:

- Conformal radiation therapy is a type of external radiation therapy that uses a computer to make a 3-dimensional (3-D) picture of the tumor and shapes the radiation beams to fit the tumor.
- Intensity-modulated radiation therapy (IMRT) is a type of 3-dimensional (3-D) radiation therapy that uses a computer to make pictures of the size and shape of the tumor. Thin beams of radiation of different intensities (strengths) are aimed at the tumor from many angles.

Radiation therapy may be given, based on the child's risk group and chemotherapy regimen. The radiation is given only to the lymph nodes or other areas with cancer.

#### Targeted therapy

Targeted therapy is a type of treatment that uses drugs or other substances to identify and attack specific cancer cells. Types of targeted therapy include:

- Monoclonal antibody therapy: Monoclonal antibodies are immune system proteins made in the laboratory to treat many diseases, including cancer. As a cancer treatment, these antibodies can attach to a specific target on cancer cells or other cells that may help cancer cells grow. The antibodies are able to then kill the cancer cells, block their growth, or keep them from spreading. Monoclonal antibodies are given by infusion. They may be used alone or to carry drugs, toxins, or radioactive material directly to cancer cells.
  Rituximab or brentuximab may be used to treat high-risk, refractory, or recurrent childhood Hodgkin lymphoma.
  monoclonal antibodies: how monoclonal antibodies treat cancer
  How do monoclonal antibodies work to treat cancer? This video shows how monoclonal antibodies, such as trastuzumab, pembrolizumab, and rituximab, block molecules cancer cells need to grow, flag cancer cells for destruction by the body’s immune system, or deliver harmful substances to cancer cells.
  YouTube (https://www.youtube.com/watch?v=dxnjAc-rqz8)

- Proteasome inhibitor therapy blocks the action of proteasomes in cancer cells. Proteasomes remove proteins no longer needed by the cell. When the proteasomes are blocked, the proteins build up in the cell and may cause the cancer cell to die.
  Bortezomib is a proteasome inhibitor used to treat refractory or recurrent childhood Hodgkin lymphoma.

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

#### Immunotherapy

Immunotherapy uses the patient's immune system to fight cancer. Substances made by the body or made in a laboratory are used to boost, direct, or restore the body's natural defenses against cancer. Types of immunotherapy include:

- Immune checkpoint inhibitor therapy: Some types of immune cells, such as T cells, and some cancer cells have certain proteins, called checkpoint proteins, on their surface that keep immune responses in check. When cancer cells have large amounts of these proteins, they will not be attacked and killed by T cells. Immune checkpoint inhibitors block these proteins, and the ability of T cells to kill cancer cells is increased. The following is a type of immune checkpoint inhibitor therapy:
  - PD-1 and PD-L1 inhibitor therapy: PD-1 is a protein on the surface of T cells that helps keep the body's immune responses in check. PD-L1 is a protein found on some types of cancer cells. When PD-1 attaches to PD-L1, it stops the T cell from killing the cancer cell. PD-1 and PD-L1 inhibitors keep PD-1 and PD-L1 proteins from attaching to each other. This allows the T cells to kill cancer cells.
    Pembrolizumab and nivolumab are types of PD-1 inhibitors that may be used in the treatment of childhood Hodgkin lymphoma that has come back after treatment.
  Immune checkpoint inhibitor. Checkpoint proteins, such as PD-L1 on tumor cells and PD-1 on T cells, help keep immune responses in check. The binding of PD-L1 to PD-1 keeps T cells from killing tumor cells in the body (left panel). Blocking the binding of PD-L1 to PD-1 with an immune checkpoint inhibitor (anti-PD-L1 or anti-PD-1) allows the T cells to kill tumor cells (right panel).
  Immune checkpoint inhibitor; the panel on the left shows the binding of proteins PD-L1 (on the tumor cell) to PD-1 (on the T cell), which keeps T cells from killing tumor cells in the body. Also shown are a tumor cell antigen and T cell receptor. The panel on the right shows immune checkpoint inhibitors (anti-PD-L1 and anti-PD-1) blocking the binding of PD-L1 to PD-1, which allows the T cells to kill tumor cells.
  immune checkpoint inhibitors
  Immunotherapy uses the body’s immune system to fight cancer. This animation explains one type of immunotherapy that uses immune checkpoint inhibitors to treat cancer.
  YouTube (https://www.youtube.com/watch?v=GIUu239FWMg)

#### Surgery

Surgery may be done to remove as much of the tumor as possible for localized nodular lymphocyte-predominant Hodgkin lymphoma in children.

#### High-dose chemotherapy with stem cell transplant

High doses of chemotherapy are given to kill cancer cells. Healthy cells, including blood-forming cells, are also destroyed by the cancer treatment. Stem cell transplant is a treatment to replace the blood-forming cells. Stem cells (immature blood cells) are removed from the blood or bone marrow of the patient or a donor and are frozen and stored. After the patient completes chemotherapy, the stored stem cells are thawed and given to the patient through an infusion. These reinfused stem cells grow into (and restore) the body's blood cells.

For more information, visit Drugs Approved for Hodgkin Lymphoma (https://www.cancer.gov/about-cancer/treatment/drugs/hodgkin-lymphoma).

### Clinical trials

A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for patients with cancer. Because cancer in children is rare, taking part in a clinical trial should be considered.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. Some clinical trials are open only to patients who have not started treatment. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

#### Proton beam radiation therapy

Proton beam therapy is a type of high-energy, external radiation therapy that uses streams of protons (small, positively-charged particles of matter) to make radiation. This type of radiation therapy may help lessen the damage to healthy tissue near the tumor, such as the breast, heart, and lungs.

### Treatment for childhood Hodgkin lymphoma causes side effects and late effects.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Side effects from cancer treatment that begin after treatment and continue for months or years are called late effects. Because late effects affect health and development, regular follow-up exams are important.

Late effects of cancer treatment may include:

- physical problems that affect:
  - development of sex and reproductive organs
  - fertility (ability to have children)
  - bone and muscle growth and development
  - thyroid, heart, or lung function
  - teeth, gums, and salivary gland function
  - spleen function (increased risk of infection)
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer), such as breast, thyroid, skin, lung, stomach, or colorectal

For female survivors of Hodgkin lymphoma, there is an increased risk of breast cancer. This risk depends on the amount of radiation the breast received during treatment and the chemotherapy regimen used. The risk of breast cancer is decreased if radiation to the ovaries was also given.

Doctors may recommend that female survivors who received radiation therapy to the breast have a mammogram and MRI once a year starting 8 years after treatment or at age 25 years, whichever is later. They may also suggest that female survivors do a breast self-exam every month beginning at puberty and have a breast exam done by a health professional every year beginning at puberty until age 25 years. The breast exams done by a health professional will increase to every 6 months at age 25 years.

For male survivors who received radiation therapy to the chest, there may be a higher risk of cardiovascular disease. Limiting radiation therapy to the chest is suggested if possible.

Dexrazoxane is a drug that can reduce the risk of long-term heart damage in Hodgkin lymphoma survivors. The drug is usually taken alongside chemotherapy and other treatments.

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the possible late effects caused by some treatments. Learn more about Late Effects of Treatment for Childhood Cancer.

### Patients may want to think about taking part in a clinical trial.

For some patients, taking part in a clinical trial may be the best treatment choice. Clinical trials are part of the cancer research process. Clinical trials are done to find out if new cancer treatments are safe and effective or better than the standard treatment.

Many of today's standard treatments for cancer are based on earlier clinical trials. Patients who take part in a clinical trial may receive the standard treatment or be among the first to receive a new treatment.

Patients who take part in clinical trials also help improve the way cancer will be treated in the future. Even when clinical trials do not lead to effective new treatments, they often answer important questions and help move research forward.

### Patients can enter clinical trials before, during, or after starting their cancer treatment.

Some clinical trials only include patients who have not yet received treatment. Other trials test treatments for patients whose cancer has not gotten better. There are also clinical trials that test new ways to stop cancer from recurring (coming back) or reduce the side effects of cancer treatment.

Clinical trials are taking place in many parts of the country. Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

### Follow-up care may be needed.

As your child goes through treatment, they will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

For patients who receive chemotherapy alone, a PET scan may be done 3 weeks or more after treatment ends. For patients who receive radiation therapy last, a PET scan should not be done until 8 to 12 weeks after treatment ends.

## Treatment of Low-Risk Classic Childhood Hodgkin Lymphoma

For information about the treatments listed below, visit the Treatment Option Overview section.

Treatment of newly diagnosed low-risk classic Hodgkin lymphoma in children may include:

- Combination chemotherapy.
- Radiation therapy may also be given to the areas with cancer.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Intermediate-Risk Classic Childhood Hodgkin Lymphoma

For information about the treatments listed below, visit the Treatment Option Overview section.

Treatment of newly diagnosed intermediate-risk classic Hodgkin lymphoma in children may include:

- Combination chemotherapy.
- Radiation therapy may also be given to the areas with cancer.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of High-Risk Classic Childhood Hodgkin Lymphoma

For information about the treatments listed below, visit the Treatment Option Overview section.

Treatment of newly diagnosed high-risk classic Hodgkin lymphoma in children may include:

- Higher-dose combination chemotherapy.
- Combination chemotherapy with targeted therapy (brentuximab) or immunotherapy (nivolumab).
- Radiation therapy may also be given to the areas with cancer.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Nodular Lymphocyte-Predominant Childhood Hodgkin Lymphoma

For information about the treatments listed below, visit the Treatment Option Overview section.

Treatment of newly diagnosed nodular lymphocyte-predominant Hodgkin lymphoma in children may include:

- Surgery, if the tumor can be completely removed.
- Chemotherapy with or without low-dose external radiation therapy.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Primary Refractory or Recurrent Hodgkin Lymphoma in Children and Adolescents

For information about the treatments listed below, visit the Treatment Option Overview section.

In children and adolescents, treatment of primary refractory Hodgkin lymphoma (cancer that does not respond to initial treatment) or recurrent Hodgkin lymphoma (cancer that came back after treatment) may include:

- Chemotherapy with or without steroids, targeted therapy (rituximab, brentuximab, or bortezomib), or both of these therapies.
- Immunotherapy (pembrolizumab or nivolumab).
- High-dose chemotherapy with stem cell transplant using the patient's own stem cells. Monoclonal antibody therapy (brentuximab) may also be given.
- Radiation therapy may be given after stem cell transplant using the patient's own stem cells or if the cancer has not responded to other treatments and the area with cancer has not been treated before.
- High-dose chemotherapy with stem cell transplant using a donor's stem cells.
- Targeted therapy (brentuximab) as maintenance and consolidation therapy for patients who have relapsed after a stem cell transplant that used the patient's own stem cells.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Coping With Your Child's Cancer

When your child has cancer, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, visit Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## To Learn More About Childhood Hodgkin Lymphoma

For more information from the National Cancer Institute about childhood Hodgkin lymphoma, visit:

- Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
- Drugs Approved for Hodgkin Lymphoma (https://www.cancer.gov/about-cancer/treatment/drugs/hodgkin-lymphoma)
- Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)
- Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy)
- Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)

For more childhood cancer information and other general cancer resources, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Late Effects of Treatment for Childhood Cancer
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood Hodgkin lymphoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Hodgkin Lymphoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/lymphoma/patient/child-hodgkin-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389224]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).